# Endometrial Cancer Prevention (PDQ®)

Patient Version

This PDQ cancer information summary has current information about endometrial cancer prevention. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Date Last Modified") is the date of the most recent change. The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Screening and Prevention Editorial Board.

## What Is Prevention?

Cancer prevention is action taken to lower the chance of getting cancer. By preventing cancer, the number of new cases of cancer in a group or population is lowered. Hopefully, this will lower the number of deaths caused by cancer.

To prevent new cancers from starting, scientists look at risk factors and protective factors. Anything that increases your chance of developing cancer is called a cancer risk factor; anything that decreases your chance of developing cancer is called a cancer protective factor.

Some risk factors for cancer can be avoided, but many cannot. For example, both smoking and inheriting certain genes are risk factors for some types of cancer, but only smoking can be avoided. Regular exercise and a healthy diet may be protective factors for some types of cancer. Avoiding risk factors and increasing protective factors may lower your risk but it does not mean that you will not get cancer.

Different ways to prevent cancer are being studied.

## General Information About Endometrial Cancer

Key Points for This Section
- Endometrial cancer is a disease in which malignant (cancer) cells form in the tissues of the endometrium.
- Endometrial cancer is most common in postmenopausal women.

### Endometrial cancer is a disease in which malignant (cancer) cells form in the tissues of the endometrium.

The endometrium is the innermost lining of the uterus. The uterus is a hollow, muscular organ in a woman's pelvis. The uterus is where a fetus grows. In most nonpregnant women, the uterus is about 3 inches long.

Anatomy of the female reproductive system. The organs in the female reproductive system include the uterus, ovaries, fallopian tubes, cervix, and vagina. The uterus has a muscular outer layer called the myometrium and an inner lining called the endometrium.

Anatomy of the female reproductive system; drawing shows the uterus, myometrium (muscular outer layer of the uterus), endometrium (inner lining of the uterus), ovaries, fallopian tubes, cervix, and vagina.

Cancer of the endometrium is different from cancer of the muscle of the uterus, which is called uterine sarcoma. For more information, visit Uterine Sarcoma Treatment.

Other PDQ summaries containing information related to endometrial cancer include:

- Endometrial Cancer Screening
- Endometrial Cancer Treatment

### Endometrial cancer is most common in postmenopausal women.

Endometrial cancer occurs most often in postmenopausal women, with 60 being the average age at diagnosis.

From 2012 to 2021, the number of new cases of endometrial cancer increased slightly in White women and by 2% to 3% each year in women of all other racial and ethnic groups. From 2013 to 2022, the number of deaths from endometrial cancer increased by just under 2% each year.

## Endometrial Cancer Prevention

Key Points for This Section
- Avoiding risk factors and increasing protective factors may help prevent cancer.
- The following risk factors increase the risk of endometrial cancer:
  - Endometrial hyperplasia
  - Estrogen
  - Tamoxifen
  - Obesity, weight gain, metabolic syndrome, and diabetes
  - Genetic factors
- The following protective factors decrease the risk of endometrial cancer:
  - Pregnancy and breast-feeding
  - Hormonal contraceptives
  - Weight loss
  - Physical activity
- It is not known if the following factors affect the risk of endometrial cancer:
  - Fruits, vegetables, and vitamins
  - Hair products, including dyes, bleach, highlights, straighteners, and permanents
- Cancer prevention clinical trials are used to study ways to prevent cancer.
- New ways to prevent endometrial cancer are being studied in clinical trials.

### Avoiding risk factors and increasing protective factors may help prevent cancer.

Avoiding cancer risk factors may help prevent certain cancers. Risk factors include smoking, having overweight, and not getting enough exercise. Increasing protective factors such as quitting smoking and exercising may also help prevent some cancers. Talk to your doctor or other health care professional about how you might lower your risk of cancer.

### The following risk factors increase the risk of endometrial cancer:

#### Endometrial hyperplasia

Endometrial hyperplasia is an abnormal thickening of the endometrium (lining of the uterus). It is not cancer, but in some cases, it may lead to endometrial cancer.

#### Estrogen

Estrogen is a hormone made by the body. It helps the body develop and maintain female sex characteristics. Estrogen can affect the growth of some cancers, including endometrial cancer.

A woman's risk of developing endometrial cancer is increased by being exposed to estrogen in the following ways:

- Estrogen-only hormone therapy: Estrogen may be given to replace the estrogen no longer produced by the ovaries in postmenopausal women or women whose ovaries have been removed. This is called hormone therapy (HT). The use of HT that contains only estrogen increases the risk of endometrial cancer, and the risk grows higher the longer the estrogen is used. For this reason, estrogen therapy alone is usually prescribed only for women who do not have a uterus.
  When estrogen is combined with progestin (another hormone), it is called combination estrogen-progestin therapy. For postmenopausal women, taking estrogen in combination with progestin does not increase the risk of endometrial cancer, but it does increase the risk of breast cancer. For more information, visit Breast Cancer Prevention.
- Early menstruation: Beginning to have menstrual periods at an early age increases the number of years the body is exposed to estrogen and increases a woman's risk of endometrial cancer.
- Late menopause: Women who reach menopause at an older age are exposed to estrogen for a longer time and have an increased risk of endometrial cancer.
- Never being pregnant: Because estrogen levels are lower during pregnancy, women who have never been pregnant are exposed to estrogen for a longer time than women who have been pregnant. This increases the risk of endometrial cancer.

#### Tamoxifen

Tamoxifen is one of a group of drugs called selective estrogen receptor modulators, or SERMs. Tamoxifen acts like estrogen on some tissues in the body, such as the uterus, but blocks the effects of estrogen on other tissues, such as the breast. Tamoxifen is used to prevent breast cancer in women who are at high risk for the disease. However, using tamoxifen for more than 2 years increases the risk of endometrial cancer. This risk is greater in postmenopausal women.

Raloxifene is a SERM that is used to prevent bone weakness in postmenopausal women. However, it does not have estrogen-like effects on the uterus and has not been shown to increase the risk of endometrial cancer.

#### Obesity, weight gain, metabolic syndrome, and diabetes

Having obesity or gaining weight as an adult increases the risk of endometrial cancer. Obesity is related to other risk factors such as high estrogen levels, having extra fat around the waist, polycystic ovary syndrome, and lack of physical activity.

Having metabolic syndrome increases the risk of endometrial cancer. Metabolic syndrome is a condition that includes extra fat around the waist, high blood sugar, high blood pressure, and high levels of triglycerides (a type of fat) in the blood.

Having type 2 diabetes may increase the risk of endometrial cancer.

#### Genetic factors

Based on solid evidence, women with certain genetic conditions have an increased risk of developing endometrial cancer.

Lynch syndrome is an inherited disorder caused by changes in certain genes. Women who have Lynch syndrome have a much higher risk of developing endometrial cancer than women who do not have Lynch syndrome.

Polycystic ovary syndrome (a disorder of the hormones made by the ovaries) and Cowden syndrome are inherited conditions that are linked to an increased risk of endometrial cancer.

Women with a family history of endometrial cancer in a first-degree relative (mother, sister, or daughter) are also at increased risk of endometrial cancer.

### The following protective factors decrease the risk of endometrial cancer:

#### Pregnancy and breast-feeding

Estrogen levels are lower during pregnancy and when breast-feeding. The risk of endometrial cancer is lower in women who have had children. Breast-feeding also decreases the risk of endometrial cancer.

#### Hormonal contraceptives

Taking hormonal contraceptives (birth control pills) that combine estrogen and progestin (combined oral contraceptives) decreases the risk of endometrial cancer. The protective effect of this type of birth control increases with the length of time they are used and can last for many years after oral contraceptive use has been stopped.

While taking birth control pills, women have a higher risk of blood clots, stroke, and heart attack, especially women who smoke and are older than 35 years.

New data suggest that other hormonal contraceptives, such as birth control devices that are inserted into a woman's uterus, may also decrease the risk of endometrial cancer.

#### Weight loss

It is not known if losing weight decreases the risk of endometrial cancer. However, having bariatric surgery (a surgery that changes how your digestive system works so you will lose weight) decreases the risk of endometrial cancer. After bariatric surgery, other obesity-related conditions, such as diabetes and metabolic syndrome often improve or go away.

Having bariatric surgery also includes risks, such as infection, blood clots, breathing or heart problems, and digestive issues.

#### Physical activity

Physical activity (exercise) may lower the risk of endometrial cancer. This includes any physical activity you do at your job or at home.

### It is not known if the following factors affect the risk of endometrial cancer:

#### Fruits, vegetables, and vitamins

A diet that includes, fruits, vegetables, phytoestrogen, soy, and vitamin D has not been found to affect the risk of endometrial cancer.

Taking multivitamins has little or no effect on the risk of common cancers, including endometrial cancer.

#### Hair products, including dyes, bleach, highlights, straighteners, and permanents

There is not enough evidence to show a link between hair products and endometrial cancer. One retrospective study discussed a possible link between certain hair products and uterine cancers, including endometrial cancers.

### Cancer prevention clinical trials are used to study ways to prevent cancer.

Cancer prevention clinical trials are used to study ways to lower the risk of developing certain types of cancer. Some cancer prevention trials include healthy people who may or may not have an increased risk of cancer. Other prevention trials include people who have had cancer and are trying to prevent recurrence or a second cancer.

The purpose of some cancer prevention clinical trials is to find out whether actions people take can prevent cancer. These may include eating fruits and vegetables, exercising, quitting smoking, or taking certain medicines, vitamins, minerals, or food supplements.

### New ways to prevent endometrial cancer are being studied in clinical trials.

Information about clinical trials supported by NCI can be found on NCI’s clinical trials search (https://www.cancer.gov/research/participate/clinical-trials-search) webpage. Clinical trials supported by other organizations can be found on the ClinicalTrials.gov website.

## About This PDQ Summary

### About PDQ

Physician Data Query (PDQ) is the National Cancer Institute's (NCI's) comprehensive cancer information database. The PDQ database contains summaries of the latest published information on cancer prevention, detection, genetics, treatment, supportive care, and complementary and alternative medicine. Most summaries come in two versions. The health professional versions have detailed information written in technical language. The patient versions are written in easy-to-understand, nontechnical language. Both versions have cancer information that is accurate and up to date and most versions are also available in Spanish (https://www.cancer.gov/espanol/publicaciones/pdq).

PDQ is a service of the NCI. The NCI is part of the National Institutes of Health (NIH). NIH is the federal government’s center of biomedical research. The PDQ summaries are based on an independent review of the medical literature. They are not policy statements of the NCI or the NIH.

### Purpose of This Summary

This PDQ cancer information summary has current information about endometrial cancer prevention. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

### Reviewers and Updates

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Updated") is the date of the most recent change.

The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Screening and Prevention Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/screening-prevention).

### Clinical Trial Information

A clinical trial is a study to answer a scientific question, such as whether one treatment is better than another. Trials are based on past studies and what has been learned in the laboratory. Each trial answers certain scientific questions in order to find new and better ways to help cancer patients. During treatment clinical trials, information is collected about the effects of a new treatment and how well it works. If a clinical trial shows that a new treatment is better than one currently being used, the new treatment may become "standard." Patients may want to think about taking part in a clinical trial. Some clinical trials are open only to patients who have not started treatment.

Clinical trials can be found online at NCI's website (https://www.cancer.gov/research/participate/clinical-trials). For more information, call the Cancer Information Service (https://www.cancer.gov/contact/contact-center) (CIS), NCI's contact center, at 1-800-4-CANCER (1-800-422-6237).

### Permission to Use This Summary

PDQ is a registered trademark. The content of PDQ documents can be used freely as text. It cannot be identified as an NCI PDQ cancer information summary unless the whole summary is shown and it is updated regularly. However, a user would be allowed to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks in the following way: [include excerpt from the summary].”

The best way to cite this PDQ summary is:

PDQ® Screening and Prevention Editorial Board. PDQ Endometrial Cancer Prevention. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/types/uterine/patient/endometrial-prevention-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389201]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use in the PDQ summaries only. If you want to use an image from a PDQ summary and you are not using the whole summary, you must get permission from the owner. It cannot be given by the National Cancer Institute. Information about using the images in this summary, along with many other images related to cancer can be found in Visuals Online (https://visualsonline.cancer.gov/). Visuals Online is a collection of more than 3,000 scientific images.

### Disclaimer

The information in these summaries should not be used to make decisions about insurance reimbursement. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s E-mail Us (https://www.cancer.gov/contact/email-us).